# Levels of Evidence for Adult and Pediatric Cancer Treatment Studies (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the formal ranking system used by the PDQ Editorial Boards to assess evidence supporting the use of specific interventions or approaches. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

A variety of end points may be measured and reported from clinical studies in oncology. These may include total mortality (or survival from the initiation of therapy), cause-specific mortality, quality of life, or indirect surrogates such as event-free survival, disease-free survival, progression-free survival, or tumor response rate. End points may also be determined within study designs of varying strength, ranging from the gold standard—the randomized, double-blinded, controlled clinical trial—to case series experiences from nonconsecutive patients.

The PDQ editorial boards use a formal ranking system of levels of evidence to help the reader judge the strength of evidence linked to the reported results of a therapeutic strategy. For any given therapy, results can be ranked on each of the following two scales: (1) strength of the study design and (2) strength of the study end points. Together, the two rankings inform the overall level of evidence. Depending on perspective, different expert panels, professional organizations, or individual physicians may use different cut points of overall strength of evidence in formulating therapeutic guidelines or in taking action. However, a formal description of the level of evidence provides a uniform framework for the data, leading to specific recommendations.

The PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment) and the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment) add information on levels of evidence, described below, to the PDQ Adult Cancer Treatment Summaries (https://www.cancer.gov/publications/pdq/information-summaries/adult-treatment) and the PDQ Pediatric Cancer Treatment Summaries (https://www.cancer.gov/publications/pdq/information-summaries/pediatric-treatment) when appropriate.

## Strength of Study Design

The various types of study design are described below in descending order of strength:

1. Randomized controlled clinical trials (RCTs).
  The double-blinded RCT is the gold standard of study design. To meet this designation, the study allocation must be blinded to the physician both before and after the randomization and treatment assignment take place. This design provides protection from allocation bias by the investigator and from bias in assessment of outcomes by both the investigator and the patient. Unfortunately, most clinical trials in oncology cannot be double-blinded after treatment allocation because procedures or toxic effects often vary substantially among study allocations in ways that are obvious to both the health care professional and the patient.
2. Meta-analyses of RCTs.
  Meta-analyses of randomized studies offer a quantitative synthesis of previously conducted studies. The strength of evidence from a meta-analysis is based on the quality of the conduct of individual studies. Moreover, meta-analyses can magnify small systematic errors in individual studies. A study comparing the results of single, large, randomized trials with those of meta-analyses of smaller trials published earlier on the same topics showed only fair agreement (kappa statistic, 0.35). Outcomes of the large RCTs were not predicted accurately by the meta-analysis 35% of the time.[1,2] Meta-analyses performed by different investigators to address the same clinical issue can reach contradictory conclusions.[2] Therefore, meta-analyses of randomized studies are placed in the same or lower category of strength of evidence as randomized studies, not at a higher level.
3. Nonrandomized controlled clinical trials.
  This category includes trials in which treatment allocation was nonrandomized and prospective. The allocation would be known to the investigator before informed consent is obtained from the patient. An imbalance can occur in treatment allocation under such circumstances. Subset analyses within randomized trials often fall into this category of evidence.
  Subset analyses of randomized studies are subject to errors inherent in multiplicity (i.e., statistically significant results are to be expected because of random variation of measured effects in multiple subsets). Therefore, subset analyses do not represent the same strength of evidence as the overall analysis of a randomized trial as designed unless explicit prospective hypotheses are made for the analyzed subset. Subset analyses should be placed in the next lower category of study design, nonrandomized controlled clinical trials.
4. Case series or other observational study designs.
  These clinical experiences are the weakest form of study design, but they may be the only available or practical information in support of a therapeutic strategy. This is especially true in the case of rare diseases or when the evolution of the therapy predates the common use of randomized study designs in medical practice. Case series or observational designs may also provide the only practical design when treatments in study arms are radically different (e.g., amputation vs. limb-sparing surgery). Nevertheless, they always raise issues of patient selection and comparability with other populations. In terms of generalizability to other populations, the strongest to weakest study designs are the following: population-based studies that have a definable population, nonpopulation-based but consecutive series, and nonconsecutive cases. Some study designs (e.g., cohort and case-control studies) have internal-control study subjects, while others do not (e.g., case-only series with no internal comparison group or case-only series that are compared with historical controls).
  Even large, population-based, observational studies with internal controls that compare therapeutic strategies in oncology should be interpreted with extreme caution. In a study that directly compared observational studies with RCT results, investigators performed a systematic MEDLINE search for observational studies published from 2000 to 2016 using data from the Surveillance, Epidemiology, and End Results (SEER) Program, SEER-Medicare, or the National Cancer Database that compared treatment regimens for any diagnosis of cancer.[3] The investigators matched 350 treatment comparisons to 121 RCTs that made the same comparison. They found no significant correlation between the hazard ratios (HRs) of the observational studies and the matching RCTs (concordance correlation coefficient, 0.08; 95% confidence interval [CI], -0.07 to 0.23). Only 40% of matched studies agreed with respect to treatment effects (kappa statistic, 0.037), and only 62% of the HRs in observational studies were within the 95% CI of the matched RCT. None of these correlations exceeded what would be expected by chance, and correlations did not improve in the studies that used the most sophisticated statistical methods of analysis, including propensity score weighting, instrumental variable adjustment, or sensitivity analysis. Of note, among the 70 observational studies ranked as rigorous and that reported overall survival, 35 reported a positive result, while the RCT reported either no difference or showed an effect in the opposite direction.

### References

LeLorier J, Grégoire G, Benhaddad A, et al.: Discrepancies between meta-analyses and subsequent large randomized, controlled trials. N Engl J Med 337 (8): 536-42, 1997.9262498 97390204
Bailar JC: The promise and problems of meta-analysis. N Engl J Med 337 (8): 559-61, 1997.9262502 97390208
Soni PD, Hartman HE, Dess RT, et al.: Comparison of Population-Based Observational Studies With Randomized Trials in Oncology. J Clin Oncol 37 (14): 1209-1216, 2019.30897037

## Strength of Study End Points

Commonly measured end points for adult and pediatric cancer treatment studies are listed below in descending order of strength:

1. Overall survival from a defined time (or total mortality).
  This outcome is arguably the most important one to patients and is also the most easily defined and least subject to investigator bias.
2. Cause-specific mortality (or cause-specific mortality from a defined time).
  Although this may be the most biologically important outcome in a disease-specific intervention, it is a more subjective end point than total mortality and more subject to investigator bias in its determination. This end point may also miss important effects of therapy that may actually shorten overall survival.
3. Carefully assessed quality of life.
  This is an extremely important end point to patients. Careful documentation of this end point within a strong study design is therefore sufficient for most physicians to incorporate a treatment into their practices.
4. Indirect surrogates.
  - Event-free survival.
  - Relapse-free survival.
  - Disease-free survival.
  - Progression-free survival.
  - Tumor response rate.
  These end points may be subject to investigator interpretation. More importantly, they may, but do not automatically, translate into direct patient benefit such as survival or quality of life. Nevertheless, it is rational in many circumstances to use a treatment that improves these surrogate end points while awaiting a more definitive end point to support its use.

## Summation of Levels of Evidence

After considering the strength of the study design and the strength of the study end points, the following levels of evidence may be added to PDQ Adult Cancer Treatment Summaries (https://www.cancer.gov/publications/pdq/information-summaries/adult-treatment) and PDQ Pediatric Cancer Treatment Summaries (https://www.cancer.gov/publications/pdq/information-summaries/pediatric-treatment):

- A1 Evidence. Randomized controlled clinical trial (RCT) (double-blinded or nonblinded) with an end point of overall survival (OS) from a defined time, total mortality, or cause-specific mortality.
- A2 Evidence. Meta-analysis of RCTs with an end point of OS from a defined time, total mortality, or cause-specific mortality.
- A3 Evidence. RCT (double-blinded or nonblinded) with an end point of quality of life that is well-collected, clinically meaningful, and carefully assessed.
- B1 Evidence. RCT (double-blinded or nonblinded) with an end point of event-free survival (EFS), relapse-free survival (RFS), disease-free survival (DFS), or progression-free survival (PFS) differences.
- B2 Evidence. Meta-analysis of RCTs with an end point of EFS, DFS, PFS, or carefully assessed quality of life.
- B3 Evidence. RCT (double-blinded or nonblinded) with an end point of tumor response rate or quality-of-life measurement that does not reach the level described in A3.
- B4 Evidence. Nonrandomized, multicenter, prospective, controlled clinical trial with a planned comparison of efficacy including an end point of OS from a defined time, total mortality, cause-specific mortality, carefully assessed quality of life, EFS, DFS, PFS, or tumor response differences.
- C1 Evidence. Case series or other observational study design, including trials with nonconsecutive cases, with an end point of OS from a defined time, total mortality, cause-specific mortality, or carefully assessed quality of life.
- C2 Evidence. Case series or other observational study design, including trials with nonconsecutive cases, with an end point of EFS, RFS, DFS, or PFS differences.
- C3 Evidence. Case series or other observational study design, including trials with nonconsecutive cases, with an end point of tumor response rate or quality-of-life measurement that does not reach the level described in A3.
- D Evidence. Anecdotal experience or expert opinion.

## Conclusion

Beyond the level of evidence, all recommendations must take into account other issues that cannot be so easily quantified, such as toxicity, width of confidence intervals of observations, trial size, quality assurance in the trial, and cost. Nevertheless, the PDQ ranking system provides a categorization of strength of evidence as a starting point to evaluate study results.

## Latest Updates to This Summary (08/03/2023)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Strength of Study End Points

Added text to state that relapse-free survival is a commonly measured end point for adult and pediatric cancer treatment studies.

Summation of Levels of Evidence

Revised text to define B1 evidence as a randomized controlled trial with an end point of event-free survival (EFS), relapse-free survival (RFS), disease-free survival (DFS), or progression-free survival (PFS) differences. Also revised text to define C2 evidence as a case series or other observational study design, including trials with nonconsecutive cases, with an end point of EFS, RFS, DFS, or PFS differences.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the formal ranking system used by the PDQ Editorial Boards to assess evidence supporting the use of specific interventions or approaches. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Levels of Evidence for Adult and Pediatric Cancer Treatment Studies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/levels-evidence/treatment. Accessed <MM/DD/YYYY>. [PMID: 26389191]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).